# Small Intestine Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of small intestine cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Small Intestine Cancer

### Incidence and Mortality

Estimated new cases and deaths from small intestine cancer in the United States in 2025:[1]

- New cases: 13,920.
- Deaths: 2,060.

Small intestine cancer types include adenocarcinoma, sarcoma, neuroendocrine tumors, gastrointestinal stromal tumors, and lymphoma. Small intestine cancer accounts for 3.8% of all digestive system malignancies.[1,2]

### Follow-Up and Survivorship

As in other gastrointestinal malignancies, the predominant modality of treatment is surgery when resection is possible, and cure relates to the ability to completely resect the cancer.

Neuroendocrine tumors of the small intestine are covered in another summary as a separate cancer entity. For more information, see Gastrointestinal Neuroendocrine Tumors Treatment.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
National Cancer Institute: SEER Cancer Stat Facts: Small Intestine Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/smint.html). Last accessed March 6, 2025.

## Cellular Classification of Small Intestine Cancer

The following tumors occur in the small intestine:

- Adenocarcinoma (most cases).
- Lymphoma (uncommon), which is usually of the non-Hodgkin type. For more information, see Indolent B-Cell Non-Hodgkin Lymphoma Treatment, Aggressive B-Cell Non-Hodgkin Lymphoma Treatment, and Peripheral T-Cell Non-Hodgkin Lymphoma Treatment.
- Sarcoma (most commonly leiomyosarcoma and more rarely angiosarcoma or liposarcoma).
- Neuroendocrine tumors. For more information, see Gastrointestinal Neuroendocrine Tumors Treatment.
- Gastrointestinal stromal tumors. For more information, see Gastrointestinal Stromal Tumors Treatment.

Approximately 25% to 50% of the primary malignant tumors in the small intestine are adenocarcinomas, and most occur in the duodenum.[1] Small intestine carcinomas may occur synchronously or metachronously at multiple sites.

Leiomyosarcomas occur most often in the ileum.

About 20% of malignant lesions of the small intestine are neuroendocrine tumors, which occur more frequently in the ileum than in the duodenum or jejunum and may be multiple.

It is uncommon to find malignant lymphoma as a solitary small intestine lesion.

### References

Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 221–34.

## Stage Information for Small Intestine Cancer

The treatment sections of this summary are organized according to histopathological type rather than stage.

### AJCC Stage Groupings and TNM Definitions

The American Joint Committee on Cancer (AJCC) has designated staging by TNM (tumor, node, metastasis) classification to define small intestine cancer. This staging classification applies only to adenocarcinomas arising in the nonampullary duodenum and small intestine. Nonadenocarcinomas arising in the small intestine should have a TNM assigned but are not assigned a stage classification.[1]

Table 1. Definitions of Primary Tumor (T)^a^

T Category | T Criteria
TX | Primary tumor cannot be assessed.
T0 | No evidence of primary tumor.
Tis | High-grade dysplasia/carcinoma in situ.
T1 | Tumor invades the lamina propria or submucosa.
−T1a | Tumor invades the lamina propria.
−T1b | Tumor invades the submucosa.
T2 | Tumor invades the muscularis propria.
T3 | Tumor invades through the muscularis propria into the subserosa, or extends into nonperitonealized perimuscular tissue (mesentery or retroperitoneum) without serosal penetration.^b^
T4 | Tumor perforates the visceral peritoneum or directly invades other organs or structures (e.g., other loops of small intestine, mesentery of adjacent loops of bowel, and abdominal wall by way of serosa; for duodenum only, invasion of pancreas or bile duct).

^a^Reprinted with permission from AJCC: Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 221–34.

^b^For T3 tumors, the nonperitonealized perimuscular tissue is, for the jejunum and ileum, part of the mesentery and, for the duodenum in areas where serosa is lacking, part of the interface with the pancreas.

Table 2. Definitions of Regional Lymph Node (N)^a^

N Category | N Criteria
NX | Regional lymph nodes cannot be assessed.
N0 | No regional lymph node metastasis.
N1 | Metastasis in one or two regional lymph nodes.
N2 | Metastasis in three or more regional lymph nodes.

^a^Reprinted with permission from AJCC: Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 221–34.

Table 3. Definitions of Distant Metastasis (M)^a^

M Category | M Criteria
M0 | No distant metastasis.
M1 | Distant metastasis present.

^a^Reprinted with permission from AJCC: Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 221–34.

Table 4. Prognostic Stage Groups for Adenocarcinoma^a^

Stage | T | N | M
0 | Tis | N0 | M0
I | T1−2 | N0 | M0
IIA | T3 | N0 | M0
IIB | T4 | N0 | M0
IIIA | Any T | N1 | M0
IIIB | Any T | N2 | M0
IV | Any T | Any N | M1

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 221–34.

### References

Small Intestine. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 221–34.

## Treatment of Small Intestine Adenocarcinoma

Treatment options:

1. For resectable primary disease:
  - Radical surgical resection.[1,2]
2. For unresectable primary disease:
  - Surgical bypass of obstructing lesion.
  - Palliative radiation therapy.
  - Clinical trials evaluating methods to improve local control, such as the use of radiation therapy with radiosensitizers with or without systemic chemotherapy.
3. For unresectable metastatic disease:
  - Clinical trials evaluating the value of new anticancer drugs and biological therapy (phase I and phase II studies).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Rose DM, Hochwald SN, Klimstra DS, et al.: Primary duodenal adenocarcinoma: a ten-year experience with 79 patients. J Am Coll Surg 183 (2): 89-96, 1996.8696551 96326510
North JH, Pack MS: Malignant tumors of the small intestine: a review of 144 cases. Am Surg 66 (1): 46-51, 2000.10651347

## Treatment of Small Intestine Leiomyosarcoma

Treatment options:

1. For resectable primary disease:
  - Radical surgical resection.
2. For unresectable primary disease:
  - Surgical bypass of obstructing lesion and radiation therapy.
  - Clinical trials evaluating the value of new anticancer drugs and biological therapy.
3. For unresectable metastatic disease:
  - Palliative surgery.
  - Palliative radiation therapy.
  - Palliative chemotherapy.
  - Clinical trials evaluating the value of new anticancer drugs and biological therapy.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Small Intestine Cancer

Treatment options:

1. For metastatic adenocarcinoma or leiomyosarcoma:
  - No standard effective chemotherapy exists for patients with recurrent metastatic adenocarcinoma or leiomyosarcoma of the small intestine. These patients should consider enrolling in phase I or II clinical trials evaluating new anticancer drugs or biological therapy.
2. For locally recurrent disease:
  - Surgery.
  - Palliative radiation therapy.
  - Palliative chemotherapy.
  - Clinical trials evaluating ways of improving local control, such as the use of radiation therapy with radiosensitizers with or without systemic chemotherapy.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (03/06/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Small Intestine Cancer

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Revised text to state that small intestine cancer accounts for 3.8% of all digestive system malignancies.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of small intestine cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Small Intestine Cancer Treatment are:

- Amit Chowdhry, MD, PhD (University of Rochester Medical Center)
- Leon Pappas, MD, PhD (Massachusetts General Hospital )

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Small Intestine Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/small-intestine/hp/small-intestine-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389423]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).